# Bladder and Other Urothelial Cancers Screening (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the screening of bladder and other urothelial cancers. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Note: The Overview section summarizes the published evidence on this topic. The rest of the summary describes the evidence in more detail.

Other PDQ summaries on Bladder Cancer Treatment and Levels of Evidence for Cancer Screening and Prevention Studies are also available.

### Benefits

There is inadequate evidence to determine whether screening for bladder and other urothelial cancers has an impact on mortality.

Description of the Evidence
- Study Design: There are no studies that directly address this question.
- Internal Validity: Not applicable (N/A).
- Consistency: N/A.
- Magnitude of Effects on Health Outcomes: N/A.
- External Validity: N/A.

### Harms

Based on fair evidence, screening for bladder and other urothelial cancers would result in unnecessary diagnostic procedures with attendant morbidity.

Description of the Evidence
- Study Design: Opinions of respected authorities based on clinical experience, descriptive studies, or reports of expert committees.
- Internal Validity: N/A.
- Consistency: N/A.
- Magnitude of Effects on Health Outcomes: Good evidence for rare harms.
- External Validity: N/A.

## Incidence and Mortality

Bladder cancer is the fourth most commonly diagnosed malignancy in men in the United States. The incidence is about three to four times higher in men than in women and about two times higher in White men than in men of other ethnic and racial groups in the United States. The incidence of bladder cancer also increases with age.[1,2] It is estimated that 84,870 new cases of bladder cancer are expected to occur in the United States in 2025.[1]

Annual incidence rates for bladder cancer have been relatively stable from 1975 to 2021, ranging from 18.6 to 19.1 (per 100,000).[2] It is estimated that 17,420 Americans will die of bladder cancer in 2025.[1]

Age-adjusted mortality from bladder cancer decreased in all races and sexes between 1975 and 2022.[2] From 2013 to 2022, bladder cancer mortality decreased by about 1% per year.[1] These changes may reflect earlier diagnosis, better therapy, less exposure to carcinogens, or some combination of these factors.

More than 90% of cancers in the bladder are transitional cell carcinomas, also called urothelial cancer. Urothelial cancer can also rarely develop in the lining of the renal pelvis, ureter, prostate, and urethra. Other important histological types include squamous cell carcinoma and adenocarcinoma. Adenocarcinomas account for less than 2% of primary bladder cancers, including metastases from the rectum, stomach, endometrium, breast, prostate, and ovary.[3]

### References

American Cancer Society: Cancer Facts and Figures 2025. American Cancer Society, 2025. Available online (https://www.cancer.org/content/dam/cancer-org/research/cancer-facts-and-statistics/annual-cancer-facts-and-figures/2025/2025-cancer-facts-and-figures-acs.pdf). Last accessed January 16, 2025.
Surveillance Research Program, National Cancer Institute: SEER*Explorer: An interactive website for SEER cancer statistics. Bethesda, MD: National Cancer Institute. Available online (https://seer.cancer.gov/statistics-network/explorer/). Last accessed December 30, 2024.
Messing EM: Urothelial tumors of the urinary tract. In: Walsh PC, Retik AB, Vaughan ED, et al., eds.: Campbell's Urology. 8th ed. Saunders, 2002, pp 2732-2773.

## Risk Factors

There are no definitive studies on the prevention of bladder or other urothelial cancers. Reduction in environmental and occupational exposures would presumably reduce urothelial cancer risk. Differences in age, sex, race, and geographic distribution may reflect differences in environmental and occupational exposure to possible toxicants. Relevant exposures include chemical exposures; cigarette smoking; infection with bacteria, parasitic fungi, or viruses; and treatment with certain chemotherapeutic agents. A positive family history of bladder cancer has also been associated with an increased risk of bladder cancer.[1,2]

### Smoking

Several populations with a variety of exposures appear to be at higher risk of developing bladder cancer. By far, the greatest known environmental risk factor in the general population is tobacco, especially cigarette smoking.[1] Individuals who smoke have a fourfold to sevenfold increased risk of developing bladder cancer than individuals who have never smoked.[3-5] Risk is reduced with cessation of smoking, but a relatively small decrease in incidence is seen for the first 5 to 7 years after cessation. Even after 10 years, the risk of an individual developing bladder cancer is still almost twice that of an individual who has never smoked.

Among the chemicals implicated in smoking-induced bladder cancer are aminobiphenyl and its metabolites.[1] It is possible that inherited and inducible enzymes are important in the activation and detoxification of aminobiphenyls and other putative bladder carcinogens. These enzymes include N-acetyltransferase 2 (NAT2),[6] cytochrome P450 1A2 (CYT 1A2),[7] and glutathione S-transferase M 1.[8] Several studies have indicated that specific genotypes and phenotypes of these enzymes and their activities, particularly in the liver and urothelium, are associated with susceptibility to smoking-induced bladder cancer and bladder cancer induced by other aryl amines, particularly in industrially exposed populations.[7,9-12] Not all of these studies, however, have been well controlled for active or former smoking histories.

### Environmental and Occupational Exposure to Certain Chemicals

A variety of industrial exposures have also been implicated as risk factors for developing bladder cancer, primarily aromatic amines, such as 2-naphthylamine, beta-naphthylamine, or 4-chloro-o-toluidine, present in the production of dyes and benzidine and its derivatives;[1] possibly chlorinated aliphatic hydrocarbons;[13] chlorination by-products in treated water;[14,15] aluminum production (polycyclic aromatic hydrocarbons, fluorides);[1] and certain aldehydes.[16]

Occupations reported to be associated with an increased risk of bladder cancer include those that involve processing paint, dye, metal, and petroleum products.[1,17]

It is estimated that 5% to 15% of patients in the United States who eventually die of bladder cancer have strong exposure histories to the above-named environmental factors (other than smoking).[18]

### Chinese Herbs

The use of contaminated Chinese herbs is also reported to be a risk factor. The prime carcinogen in these herbs appears to be aristolochic acid (AA) extracted from species of Aristolochia.[19] Because of the diversity of Chinese herbal regimens used in addition to AA, other unidentified phytotoxins may also play a role.[20] The chronic nephropathy associated with ingestion of herbs contaminated with A. fangchi has been linked to urothelial carcinoma of the renal pelvis and ureter. Herbs with A. fangchi are banned from Belgium, Canada, Australia, and Germany but are still available in the United States.[21]

### Exposure to Arsenic

Ingestion of large quantities of arsenic in well water has also been associated with numerous malignancies, including transitional cell carcinoma (TCC) of the bladder.[1,22,23] Similar endemic pockets of bladder cancer are found in other regions with high arsenic concentrations in drinking water.[22,23] In South Taiwan, arsenic blackfoot disease is endemic.

Exposure to inorganic arsenic compounds, such as gallium arsenide, is also associated with an increased risk of bladder cancer.

### Treatment With Cyclophosphamide or Ifosfamide

Exposure to the cancer chemotherapy agent cyclophosphamide [24,25] and perhaps other alkylating agents, such as ifosfamide (although the use of mesna in conjunction with these agents may reduce the incidence), is associated with an increased risk of bladder cancer.[24]

### Pelvic Radiation Therapy

Pelvic radiation therapy for other malignancies, such as prostate cancer,[26,27] uterine cancer,[28] and cervical cancer, is also associated with an increased risk of bladder cancer.[29]

### Genetic Mutations

Specific genetic mutations associated with bladder cancer include the following:[30-32]

- HRAS mutation (Costello syndrome or Faciocutaneoskeletal syndrome).
- RB1 mutation.
- PTEN/MMAC1 mutation (Cowden syndrome).
- NAT2 slow acetylator phenotype.
- GSTM1 null phenotype.

### Other Risk Factors

Additional risk factors associated with more aggressive forms of bladder cancer include neuropathic bladder and associated indwelling catheters [33,34] and Schistosoma haematobium bladder infections (Bilharzial bladder cancer).[35]

Urothelial tumors other than TCC include adenocarcinoma, squamous cell carcinoma, and metastatic adenocarcinoma. Risks of squamous cell tumors in the bladder include indwelling catheters [36,37] and S. haematobium cystitis.

### References

Burger M, Catto JW, Dalbagni G, et al.: Epidemiology and risk factors of urothelial bladder cancer. Eur Urol 63 (2): 234-41, 2013.22877502
Messing EM: Urothelial tumors of the urinary tract. In: Walsh PC, Retik AB, Vaughan ED, et al., eds.: Campbell's Urology. 8th ed. Saunders, 2002, pp 2732-2773.
Morrison AS: Advances in the etiology of urothelial cancer. Urol Clin North Am 11 (4): 557-66, 1984.
Burch JD, Rohan TE, Howe GR, et al.: Risk of bladder cancer by source and type of tobacco exposure: a case-control study. Int J Cancer 44 (4): 622-8, 1989.2793235 90007748
Clavel J, Cordier S, Boccon-Gibod L, et al.: Tobacco and bladder cancer in males: increased risk for inhalers and smokers of black tobacco. Int J Cancer 44 (4): 605-10, 1989.2793232 90007745
Gu J, Liang D, Wang Y, et al.: Effects of N-acetyl transferase 1 and 2 polymorphisms on bladder cancer risk in Caucasians. Mutat Res 581 (1-2): 97-104, 2005.15725609
Horn EP, Tucker MA, Lambert G, et al.: A study of gender-based cytochrome P4501A2 variability: a possible mechanism for the male excess of bladder cancer. Cancer Epidemiol Biomarkers Prev 4 (5): 529-33, 1995 Jul-Aug.7549810 96055552
Engel LS, Taioli E, Pfeiffer R, et al.: Pooled analysis and meta-analysis of glutathione S-transferase M1 and bladder cancer: a HuGE review. Am J Epidemiol 156 (2): 95-109, 2002.12117698
Risch A, Wallace DM, Bathers S, et al.: Slow N-acetylation genotype is a susceptibility factor in occupational and smoking related bladder cancer. Hum Mol Genet 4 (2): 231-6, 1995.7757072 95276735
Bell DA, Taylor JA, Paulson DF, et al.: Genetic risk and carcinogen exposure: a common inherited defect of the carcinogen-metabolism gene glutathione S-transferase M1 (GSTM1) that increases susceptibility to bladder cancer. J Natl Cancer Inst 85 (14): 1159-64, 1993.8320745 93308751
Lower GM, Nilsson T, Nelson CE, et al.: N-acetyltransferase phenotype and risk in urinary bladder cancer: approaches in molecular epidemiology. Preliminary results in Sweden and Denmark. Environ Health Perspect 29: 71-9, 1979.510245 80068802
Sanderson S, Salanti G, Higgins J: Joint effects of the N-acetyltransferase 1 and 2 (NAT1 and NAT2) genes and smoking on bladder carcinogenesis: a literature-based systematic HuGE review and evidence synthesis. Am J Epidemiol 166 (7): 741-51, 2007.17675654
Steineck G, Plato N, Norell SE, et al.: Urothelial cancer and some industry-related chemicals: an evaluation of the epidemiologic literature. Am J Ind Med 17 (3): 371-91, 1990.2407118 90164612
King WD, Marrett LD: Case-control study of bladder cancer and chlorination by-products in treated water (Ontario, Canada). Cancer Causes Control 7 (6): 596-604, 1996.8932920 97086891
Villanueva CM, Cantor KP, Grimalt JO, et al.: Bladder cancer and exposure to water disinfection by-products through ingestion, bathing, showering, and swimming in pools. Am J Epidemiol 165 (2): 148-56, 2007.17079692
Stadler WM: Molecular events in the initiation and progression of bladder cancer (review). Int J Oncol 3: 549-557, 1993.
Brown T, Slack R, Rushton L, et al.: Occupational cancer in Britain. Urinary tract cancers: bladder and kidney. Br J Cancer 107 (Suppl 1): S76-84, 2012.22710682
Cole P, Hoover R, Friedell GH: Occupation and cancer of the lower urinary tract. Cancer 29 (5): 1250-60, 1972.5021618 72168003
Cosyns JP: Aristolochic acid and 'Chinese herbs nephropathy': a review of the evidence to date. Drug Saf 26 (1): 33-48, 2003.12495362
Chang CH, Wang YM, Yang AH, et al.: Rapidly progressive interstitial renal fibrosis associated with Chinese herbal medications. Am J Nephrol 21 (6): 441-8, 2001 Nov-Dec.11799260
Kessler DA: Cancer and herbs. N Engl J Med 342 (23): 1742-3, 2000.10841878
Fernández MI, López JF, Vivaldi B, et al.: Long-term impact of arsenic in drinking water on bladder cancer health care and mortality rates 20 years after end of exposure. J Urol 187 (3): 856-61, 2012.22248521
Letašiová S, Medve'ová A, Šovčíková A, et al.: Bladder cancer, a review of the environmental risk factors. Environ Health 11 (Suppl 1): S11, 2012.22759493
Monach PA, Arnold LM, Merkel PA: Incidence and prevention of bladder toxicity from cyclophosphamide in the treatment of rheumatic diseases: a data-driven review. Arthritis Rheum 62 (1): 9-21, 2010.20039416
O'Keane JC: Carcinoma of the urinary bladder after treatment with cyclophosphamide. N Engl J Med 319 (13): 871, 1988.3412418 88318880
Abern MR, Dude AM, Tsivian M, et al.: The characteristics of bladder cancer after radiotherapy for prostate cancer. Urol Oncol 31 (8): 1628-34, 2013.22575239
Nieder AM, Porter MP, Soloway MS: Radiation therapy for prostate cancer increases subsequent risk of bladder and rectal cancer: a population based cohort study. J Urol 180 (5): 2005-9; discussion 2009-10, 2008.18801517
Lönn S, Gilbert ES, Ron E, et al.: Comparison of second cancer risks from brachytherapy and external beam therapy after uterine corpus cancer. Cancer Epidemiol Biomarkers Prev 19 (2): 464-74, 2010.20142245
Chaturvedi AK, Engels EA, Gilbert ES, et al.: Second cancers among 104,760 survivors of cervical cancer: evaluation of long-term risk. J Natl Cancer Inst 99 (21): 1634-43, 2007.17971527
Lindor NM, McMaster ML, Lindor CJ, et al.: Concise handbook of familial cancer susceptibility syndromes - second edition. J Natl Cancer Inst Monogr (38): 1-93, 2008.18559331
Gallagher DJ, Feifer A, Coleman JA: Genitourinary cancer predisposition syndromes. Hematol Oncol Clin North Am 24 (5): 861-83, 2010.20816578
Marees T, Moll AC, Imhof SM, et al.: Risk of second malignancies in survivors of retinoblastoma: more than 40 years of follow-up. J Natl Cancer Inst 100 (24): 1771-9, 2008.19066271
Hamid R, Bycroft J, Arya M, et al.: Screening cystoscopy and biopsy in patients with neuropathic bladder and chronic suprapubic indwelling catheters: is it valid? J Urol 170 (2 Pt 1): 425-7, 2003.12853791
Delnay KM, Stonehill WH, Goldman H, et al.: Bladder histological changes associated with chronic indwelling urinary catheter. J Urol 161 (4): 1106-8; discussion 1108-9, 1999.10081848
Lucas SB: Squamous cell carcinoma of the bladder and schistosomiasis. East Afr Med J 59 (5): 345-51, 1982.7173071 83078981
Kantor AF, Hartge P, Hoover RN, et al.: Urinary tract infection and risk of bladder cancer. Am J Epidemiol 119 (4): 510-5, 1984.6711540 84175934
Locke JR, Hill DE, Walzer Y: Incidence of squamous cell carcinoma in patients with long-term catheter drainage. J Urol 133 (6): 1034-5, 1985.3999203 85211064

## Inheritance

Although occasional familial clusters have been anecdotally reported [1-3] and bladder cancer (as well as upper urinary tract transitional cell carcinomas) is part of the Lynch syndrome II,[4] there is no evidence that tendencies toward developing bladder cancer are inherited.[5]

### References

Fraumeni JF Jr, Thomas LB: Malignant bladder tumors in a man and his three sons. JAMA 201 (7): 97-9, 1967.
Aherne G: Retinoblastoma associated with other primary malignant tumours. Trans Ophthalmol Soc U K 94 (4): 938-44, 1974.4534143
McCullough DL, Lamma DL, McLaughlin AP, et al.: Familial transitional cell carcinoma of the bladder. J Urol 113 (5): 629-35, 1975.1127804 75153807
Lynch HT, Ens JA, Lynch JF: The Lynch syndrome II and urological malignancies. J Urol 143 (1): 24-8, 1990.2294255 90096258
Kiemeney LA, Moret NC, Witjes JF, et al.: Familial aggregation of transitional cell carcinoma of the urinary tract. [Abstract] Proceedings of the American Urological Association 155(suppl): A-1520, 691a, 1996.

## Clinical Presentation

Seventy percent of patients with bladder cancer have superficial disease at presentation.[1] Hematuria is the most common presenting sign, occurring in about 90% of cases. Hematuria may be intermittent, so a urinalysis without red blood cells does not exclude a diagnosis of urothelial cancer. In patients with macroscopic hematuria, the reported rates of bladder cancer range from 13% to 34.5%.[2-4] Other presenting symptoms include dysuria, urinary frequency or urgency, and less commonly, flank pain secondary to obstruction, and pain from pelvic invasion or bone metastases. Diagnosis and staging usually begin with cystoscopy. Full evaluation of the upper and lower urinary tract is required.[5]

### References

Shipley WU, Kaufman DS, McDougal WS: Cancer of the bladder. In: DeVita VT Jr, Hellman S, Rosenberg SA, eds.: Cancer: Principles and Practice of Oncology. 7th ed. Lippincott Williams & Wilkins, 2005, pp 1168-85.
Varkarakis MJ, Gaeta J, Moore RH, et al.: Superficial bladder tumor. Aspects of clinical progression. Urology 4 (4): 414-20, 1974.4423768 75032040
Sultana SR, Goodman CM, Byrne DJ, et al.: Microscopic haematuria: urological investigation using a standard protocol. Br J Urol 78 (5): 691-6; discussion 697-8, 1996.8976762
Khadra MH, Pickard RS, Charlton M, et al.: A prospective analysis of 1,930 patients with hematuria to evaluate current diagnostic practice. J Urol 163 (2): 524-7, 2000.10647670 20112196
Carmack AJ, Soloway MS: The diagnosis and staging of bladder cancer: from RBCs to TURs. Urology 67 (3 Suppl 1): 3-8; discussion 8-10, 2006.16530066

## Histopathology

More than 90% of bladder cancers diagnosed in the United States are pure transitional cell carcinomas (TCCs) or TCCs mixed with other histologies, primarily squamous cell carcinomas (SCCs), adenocarcinomas, or both. An additional 3% to 4% are pure SCCs, which are approximately twice as likely to occur in women as in men. SCCs also represent a greater proportion of bladder cancers occurring in individuals who have S. haematobium infections of the bladder or who have histories of long-term indwelling urinary catheters, bladder stones, or recurrent bladder infections.[1-3]

Both the grade and stage at diagnosis of TCC have extremely important prognostic and therapeutic implications. Nontransitional cell histologies, however, all behave very aggressively and are less responsive to treatments other than extirpative surgery.[4] The prognosis of patients and the choice of treatments depend on the aggressiveness and grade of the tumor.

### References

O'Keane JC: Carcinoma of the urinary bladder after treatment with cyclophosphamide. N Engl J Med 319 (13): 871, 1988.3412418 88318880
Kantor AF, Hartge P, Hoover RN, et al.: Urinary tract infection and risk of bladder cancer. Am J Epidemiol 119 (4): 510-5, 1984.6711540 84175934
Locke JR, Hill DE, Walzer Y: Incidence of squamous cell carcinoma in patients with long-term catheter drainage. J Urol 133 (6): 1034-5, 1985.3999203 85211064
Messing EM: Urothelial tumors of the urinary tract. In: Walsh PC, Retik AB, Vaughan ED, et al., eds.: Campbell's Urology. 8th ed. Saunders, 2002, pp 2732-2773.

## Grade and Stage of Newly Diagnosed Bladder Cancer in an Unscreened Population

The critical nature of the histological grade and stage of index lesions for individual prognosis and management decisions has been well recognized for many years. In a study that attempted to evaluate grade and stage in newly diagnosed bladder tumors in a population-based setting, 89% of all newly diagnosed bladder cancers in men aged 50 years and older reported to the state of Wisconsin tumor registry in 1988 had blocks and slides reviewed by a single pathologist who did not know the original diagnosis.[1] Fifty-seven percent of specimens were grade 1 or 2, stage Ta or T1 transitional cell carcinomas (TCCs); 19% were grade 3, stage Ta or T1 (or Tis) TCCs; and 24% were muscularis propria invading or deeper (stage T2+), almost all of which were grade 3 lesions or of nontransitional cell histologies. Because of Wisconsin’s small population of Black males aged 50 years and older (fewer than 3% of all bladder cancers occurred in non-White individuals),[2] differences in grade and stage at presentation between Black and White individuals could not be determined. Similarly, this study did not look at females or at males younger than 50 years. Because of variability in histological interpretations of bladder cancers recorded by tumor registries,[3,4] the presenting grade and stage of this malignancy in Wisconsin is known only for males aged 50 years and older.

Almost all bladder malignancies originate on the uroepithelial surface. Most patients who die of bladder cancer do so from metastatic disease; treatment for metastatic bladder cancer is rarely, if ever, curative.[5] The overwhelming majority of patients with metastases have concomitant or prior muscularis propria (stage T2+) invading lesions.[6] Seventy percent to 90% of patients with muscularis propria invading bladder cancer present with this diagnosis; however,[7,8] they do not come from the much larger pool of patients with recurring superficial TCCs. The goal of screening is the early detection of bladder cancer that is destined to become muscle invading. Although one study reported that approximately 30% of patients with superficial TCC followed for 20 years eventually die of this disease,[9] these data remain unconfirmed, are at odds with other reports,[10] and may reflect outmoded patterns of diagnosis, classification, and management.

Because bladder cancer is almost never incidentally found at autopsy, the preclinical duration in which it has not yet caused symptoms, but in which it can be detected by cystoscopy, is probably brief. This rapid growth rate is supported by clinical experience [11] and implies that screening would have to be performed at frequent intervals.

### References

Messing EM, Young TB, Hunt VB, et al.: Comparison of bladder cancer outcome in men undergoing hematuria home screening versus those with standard clinical presentations. Urology 45 (3): 387-96; discussion 396-7, 1995.7879333 95185009
Briggs NC, Young TB, Gilchrist KW, et al.: Age as a predictor of an aggressive clinical course for superficial bladder cancer in men. Cancer 69 (6): 1445-51, 1992.1540882 92174074
Messing EM: Urothelial tumors of the urinary tract. In: Walsh PC, Retik AB, Vaughan ED, et al., eds.: Campbell's Urology. 8th ed. Saunders, 2002, pp 2732-2773.
Lynch CF, Platz CE, Jones MP, et al.: Cancer registry problems in classifying invasive bladder cancer. J Natl Cancer Inst 83 (6): 429-33, 1991.1999849 91155133
Saxman SB, Propert KJ, Einhorn LH, et al.: Long-term follow-up of a phase III intergroup study of cisplatin alone or in combination with methotrexate, vinblastine, and doxorubicin in patients with metastatic urothelial carcinoma: a cooperative group study. J Clin Oncol 15 (7): 2564-9, 1997.9215826 97358730
Jewett HJ, Strong GH: Infiltrating carcinoma of the bladder; relation of depth of penetration of the bladder wall to incidence of local extension and metastases. J Urol 55: 366-72, 1946.21020382
Kaye KW, Lange PH: Mode of presentation of invasive bladder cancer: reassessment of the problem. J Urol 128 (1): 31-3, 1982.7109064 82269251
Hopkins SC, Ford KS, Soloway MS: Invasive bladder cancer: support for screening. J Urol 130 (1): 61-4, 1983.6864916 83241985
Holmäng S, Hedelin H, Anderström C, et al.: The relationship among multiple recurrences, progression and prognosis of patients with stages Ta and T1 transitional cell cancer of the bladder followed for at least 20 years. J Urol 153 (6): 1823-6; discussion 1826-7, 1995.7752327 95271760
Prout GR, Barton BA, Griffin PP, et al.: Treated history of noninvasive grade 1 transitional cell carcinoma. The National Bladder Cancer Group. J Urol 148 (5): 1413-9, 1992.1433540 93059733
Messing EM, Young TB, Hunt VB, et al.: Hematuria home screening: repeat testing results. J Urol 154 (1): 57-61, 1995.7776456 95295099

## Screening Methods

### Cystoscopy and Cytology

The use of cystoscopies and bladder wash/urinary cytologic examinations has proven quite successful in the surveillance and management of patients with previously treated bladder cancers.[1] These means are not practical in individuals without a history of bladder cancer because of expense and morbidity.

### Hematuria

Although hematuria is the most common presenting sign of bladder cancer, most individuals with hematuria do not have bladder cancer. In the general population, the prevalence of asymptomatic gross hematuria is about 2.5%, while the prevalence of asymptomatic microhematuria is about 13%.[2] In a recent prospective analysis of patients attending a hematuria clinic in the United Kingdom, 183 of the 948 patients (19.2%) with gross hematuria were found to have bladder cancer on cystoscopy.[3] However, only 47 of the 982 patients (4.8%) with microhematuria were found to have bladder cancer.

### One-Time Hematuria Testing

Two groups have reported on the use of testing a single urine specimen for blood to detect urologic malignancies, serious urinary tract diseases, and bladder cancers. Both studies were performed retrospectively to ascertain information from patients who were seen at a large multispecialty clinic [2] or who subscribed to a large health maintenance organization (HMO) and were tested in a multiphasic screening.[4] Because of the retrospective nature of each study, neither was designed to specifically look for bladder cancer detection or to focus on the population at highest risk (men aged 50 years and older). Both studies concluded that single hematuria testing was not effective in diagnosing bladder cancer. A longer follow-up of the HMO study indicated that individuals with microhematuria were at a higher risk of subsequent development of muscle-invading bladder cancer, with a latency of 3.5 to 14.5 years.[5] There is insufficient evidence to indicate that single hematuria testing is effective in screening for bladder cancer, and there is no evidence that single hematuria testing results in reduced mortality from the disease.

### Repetitive Hematuria Testing

Two studies using Ames Hemastix, a chemical reagent strip for hemoglobin that correlates with microscopic urinalysis in detecting hematuria,[6] were conducted in geographically defined (Madison, Wisconsin and Leeds, England) populations of middle-aged and older men using repetitive home reagent strip testing. In each program, patients were solicited from patient care registries. Men with histories of previous urologic malignancies, or known causes of hematuria, or who were noncompliant were eliminated. In the four studies performed (one pilot study and one larger study at each site), 45% to 55% of solicited individuals took part. In these studies, 1.2% to 1.3% of all participants were found to have bladder cancer (all transitional cell carcinomas [TCCs]). Only 1 of the 21 patients in the first study [6-8] and none of the 26 detected in the second study had stage T2 or greater malignancy. As a limitation of repetitive hematuria screening in a general population of men aged 50 years and older, more than 90% of individuals with positive tests upon initial workup were found not to have bladder cancer.[6] In the Wisconsin hematuria screening studies, all patients who were hematuria positive with negative workups or who were found to have no serious disease were followed for at least 24 months, with no findings of developing bladder cancer. Similarly, at least 18 months after their last testing, no screening participant (with or without hematuria) had died of bladder cancer. In the 14-year follow-up of this screening cohort, no participant with bladder cancer detected by hematuria screening had died of bladder cancer, while two (0.85%) with hematuria and a negative workup developed the disease 6.7 and 11.4 years after their negative workup. The same proportion of participants without hematuria during screening were diagnosed with bladder cancer (0.93%), none within 1 year after their last testing date.[9] It is possible that longer follow-up is necessary to prove that these participants did not have bladder cancer;[5] however, such studies are not available. The relatively low positive predictive value of repetitive hematuria testing (7.6% for bladder cancer and 11.6% for all malignancies) [6,8,10] raises questions about the practicality of this mode of screening.

### Other Possible Screening Modalities

The accuracy of voided urine cytology in detecting bladder cancer has been evaluated primarily in patients with histories of bladder cancer who are undergoing cystoscopic surveillance or as a routine test performed in all patients attending a large urology office in a multispecialty clinic. In the studies of patients with histories of bladder cancer, voided urinary cytology was effective in diagnosing 20% to 40% of grade 1 TCCs, 20% to 50% of grade 2 malignancies, and 60% to 80% of grade 3/Tis cancers.[11,12] Although such studies were not performed in patients without either hematuria or histories of recurrent bladder tumors, a major concern for screening purposes is the lack of sensitivity for well-differentiated and moderately differentiated TCCs and the large proportion of specimens in which an insufficient number of cells were present for any cytologic diagnosis to be offered. Although false-positive results were exceedingly rare, the lack of sensitivity even in this highly suspect population make voided urine cytology an inappropriate test for screening the general population. No studies have looked at outcome of cytologic screening on disease-related mortality in a non–industrially exposed population. Outcomes of patients screened at the urology clinic are also not available.[11]

The outcomes of men diagnosed with bladder cancer through a hematuria home screening program using a chemical reagent strip were compared with a statewide population-based sample of 87% of all men aged 50 years and older from the Wisconsin tumor registry.[8] Histological sections were blindly reviewed, and similar proportions of low-grade superficial versus high-grade or invasive cases were found; the proportion of late-stage (T2 or higher) disease was lower in the screened patients. At 14 years, 20.4% of tumor registry patients had died of bladder cancer (including 50% of those with muscle-invading grade 3 lesions); however, at 14 years of follow-up, no participant with bladder cancer detected by screening had died of bladder cancer.[13] Whether these differences resulted from some combination of lead-time effect, overdiagnosis, and selection biases, a real screening effect cannot be determined.

The measurement of a variety of molecules and cellular elements screened in urine has been proposed, and in some cases marketed, to monitor previously diagnosed bladder cancer patients. However, the specificity and sensitivity of these markers have not been assessed in a screening setting in a general population, but several such studies are under way.

### References

Whelan P, Britton JP, Dowell AC: Three-year follow-up of bladder tumours found on screening. Br J Urol 72 (6): 893-6, 1993.8306152 94138733
Mohr DN, Offord KP, Owen RA, et al.: Asymptomatic microhematuria and urologic disease. A population-based study. JAMA 256 (2): 224-9, 1986.3723707 86254536
Khadra MH, Pickard RS, Charlton M, et al.: A prospective analysis of 1,930 patients with hematuria to evaluate current diagnostic practice. J Urol 163 (2): 524-7, 2000.10647670 20112196
Hiatt RA, Ordoñez JD: Dipstick urinalysis screening, asymptomatic microhematuria, and subsequent urological cancers in a population-based sample. Cancer Epidemiol Biomarkers Prev 3 (5): 439-43, 1994 Jul-Aug.7848421 95003991
Friedman GD, Carroll PR, Cattolica EV, et al.: Can hematuria be a predictor as well as a symptom or sign of bladder cancer? Cancer Epidemiol Biomarkers Prev 5 (12): 993-6, 1996.8959322 97118480
Messing EM, Young TB, Hunt VB, et al.: The significance of asymptomatic microhematuria in men 50 or more years old: findings of a home screening study using urinary dipsticks. J Urol 137 (5): 919-22, 1987.2437335 87199011
Messing EM, Young TB, Hunt VB, et al.: Hematuria home screening: repeat testing results. J Urol 154 (1): 57-61, 1995.7776456 95295099
Messing EM, Young TB, Hunt VB, et al.: Comparison of bladder cancer outcome in men undergoing hematuria home screening versus those with standard clinical presentations. Urology 45 (3): 387-96; discussion 396-7, 1995.7879333 95185009
Madeb R, Golijanin D, Knopf J, et al.: Long-term outcome of patients with a negative work-up for asymptomatic microhematuria. Urology 75 (1): 20-5, 2010.19913883
Kiemeney LA, Coebergh JW, Koper NP, et al.: Bladder cancer incidence and survival in the south-eastern part of The Netherlands, 1975-1989. Eur J Cancer 30A (8): 1134-7, 1994.7654445 95383042
Rife CC, Farrow GM, Utz DC: Urine cytology of transitional cell neoplasms. Urol Clin North Am 6 (3): 599-612, 1979.505675 80060070
Murphy WM, Rivera-Ramirez I, Medina CA, et al.: The bladder tumor antigen (BTA) test compared to voided urine cytology in the detection of bladder neoplasms. J Urol 158 (6): 2102-6, 1997.9366322 98031650
Messing EM, Madeb R, Young T, et al.: Long-term outcome of hematuria home screening for bladder cancer in men. Cancer 107 (9): 2173-9, 2006.17029275

## Special Populations

In populations at particularly high risk of developing bladder cancer (other than those with histories of bladder cancer), few screening studies that have assessed bladder cancer mortality have been published.[1-4] A study of annual cytology in aluminum workers exposed to coal tar pitch in Quebec showed a nearly 40% reduction in bladder cancer case-fatality 6 years after diagnosis, compared with a historical control group of workers from the same plants who were not screened;[5] the difference, however, was not statistically significant. Awareness of an adverse outcome in the unscreened predecessors may have influenced participation in the program and workers’ awareness of symptoms, the willingness of workers and physicians to initiate diagnostic investigations based on signs and symptoms, and the compliance of workers with medical recommendations for evaluation and treatment. The brief duration of follow-up in the screened group may have artifactually improved the outcome.

No randomized controlled bladder cancer screening trials have been conducted in environmentally or industrially exposed cohorts. Completed studies have usually not had comparable control groups, have not been of sufficient sample size to show an effect on outcome, and have been of insufficient length to show a mortality benefit (or lack thereof) for the modality or modalities being assessed.[2,3] One study described the usefulness of measuring three biomarkers in voided urine for risk assessment and cancer detection in a large cohort of Chinese workers at increased risk of bladder cancer.[6] The workers were individually stratified, screened, monitored, and diagnosed on the basis of predefined molecular biomarker profiles. These techniques remain investigational.

### References

Yamaguchi N, Tazaki H, Okubo T, et al.: Periodic urine cytology surveillance of bladder tumor incidence in dyestuff workers. Am J Ind Med 3 (2): 139-48, 1982.7138633 83045662
Cartwright RA: Bladder cancer screening in the United Kingdom. J Occup Med 32 (9): 878-80, 1990.2074512 91162403
Schulte PA: Screening for bladder cancer in high-risk groups: delineation of the problem. J Occup Med 32 (9): 789-92, 1990.2074499 91162388
Cartwright RA, Gadian T, Garland JB, et al.: The influence of malignant cell cytology screening on the survival of industrial bladder cancer cases. J Epidemiol Community Health 35 (1): 35-8, 1981.7264531 81265979
Thériault GP, Tremblay CG, Armstrong BG: Bladder cancer screening among primary aluminum production workers in Quebec. J Occup Med 32 (9): 869-72, 1990.2074510 91162401
Hemstreet GP, Yin S, Ma Z, et al.: Biomarker risk assessment and bladder cancer detection in a cohort exposed to benzidine. J Natl Cancer Inst 93 (6): 427-36, 2001.11259468

## Latest Updates to This Summary (04/08/2025)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Incidence and Mortality

Updated statistics with estimated new cases for 2025 (cited American Cancer Society as reference 1).

Updated statistics with estimated deaths for 2025.

Revised text to state that from 2013 to 2022, urinary bladder cancer mortality decreased by about 1% per year.

This summary is written and maintained by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the screening of bladder and other urothelial cancers. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Screening and Prevention Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Bladder and Other Urothelial Cancers Screening. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/bladder/hp/bladder-screening-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389217]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).